# Cardiopulmonary Syndromes (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the pathophysiology and treatment of cardiopulmonary syndromes, including dyspnea, malignant pleural effusion, malignant pericardial effusion, and superior vena cava syndrome. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Cardiopulmonary Syndromes Overview

Cardiopulmonary syndromes are conditions of the heart and lung that may be caused by cancer or by other health problems. Five cardiopulmonary syndromes that may be caused by cancer are covered in this summary:

- Dyspnea (shortness of breath).
- Chronic cough.
- Malignant pleural effusion (extra fluid around the lungs caused by cancer).
- Malignant pericardial effusion (extra fluid in the sac around the heart caused by cancer).
- Superior vena cava syndrome (a blocked superior vena cava, the large vein that takes blood back to the heart).

This summary is about cardiopulmonary syndromes in adults and children with cancer. Section titles show when the information is about children.

## Dyspnea During Advanced Cancer

Key Points for This Section
- Many conditions can cause dyspnea.
- A physical exam and health history are important in finding out the cause of dyspnea.
- There are different ways to treat the causes of dyspnea in cancer patients.
- Treatment of dyspnea will depend on what is causing it.
- Treatment may be to control the signs and symptoms of dyspnea.

### Many conditions can cause dyspnea.

Dyspnea is the feeling that you can't catch your breath or you can't breathe in enough air. It also may be called shortness of breath, breathlessness, or air hunger. In cancer patients, dyspnea can be caused by the following:

- Tumor-related effects:
  - The tumor blocks the airways in the chest and lung or it blocks the vein that carries blood through the chest to the heart.
  - The tumor causes extra fluid to build up in the space between the thin layer of tissue covering the lung and the thin layer of tissue covering the chest wall (pleural effusion), between the sac that covers the heart and the heart (pericardial effusion), or in the abdominal cavity (ascites).
  - Superior vena cava syndrome. (a group of signs or symptoms that occur when the superior vena cava is partly blocked).
  - Carcinomatous lymphangitis (inflammation of the lymph vessels).
  - Pneumonia and other chest infections.
  - Pneumonitis (inflammation of the lungs).
  - Blood clots or tumor cells break loose and block a blood vessel in the lungs.
  - Paralysis of part of the diaphragm (a muscle used for breathing).
  - Breathing muscles get weaker.
- Treatment-related effects:
  - Damage to the lung caused by radiation therapy or chemotherapy. A small number of women who receive radiation therapy for breast cancer develop postradiation bronchiolitis obliterans, a condition in which the bronchioles (tiny branches of air tubes in the lungs) become inflamed and blocked.
  - Weakened heart muscle caused by chemotherapy.
  - Immunotherapy-related pneumonitis. Pneumonitis linked to immunotherapy with a checkpoint inhibitor is uncommon but can be serious or life-threatening. In one study of patients treated for immunotherapy-related pneumonitis, melanoma and non-small cell lung cancer were the most common cancers. The length of time that patients received immunotherapy before developing pneumonitis varied from several days to over a year. In addition, pneumonitis seemed to occur earlier in patients who received combination therapy than in those who received one type of treatment.
- Conditions that are not related to cancer:
  - Chronic obstructive pulmonary disease (COPD), such as chronic bronchitis or emphysema.
  - Bronchospasm. The muscles in the airways contract and cause spasms.
  - Congestive heart failure.
  - Anemia.
- Conditions with no known physical cause, such as anxiety.

### A physical exam and health history are important in finding out the cause of dyspnea.

Diagnostic tests and procedures include the following:

- Physical exam and health history: An exam of the body to check general signs of health, including checking for signs or symptoms of dyspnea, such as breathing fast or using the neck or chest muscles to breathe. A history of your health habits and past illnesses and treatments will also be taken. Your doctor will also ask about when the dyspnea occurs, what it feels like, other signs or symptoms that happen at the same time as the dyspnea, and anything that makes it better or worse.
- Functional assessment: An exam to check how the dyspnea affects your ability to perform activities of daily living such as eating, bathing, or climbing stairs. This exam may include a 6-minute walk test (6MWT) to measure how far you can walk on a flat, hard surface in 6 minutes.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
  A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
  Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Complete blood count: A procedure in which a sample of blood is taken and checked for the following:
  - The number of red blood cells, white blood cells, and platelets.
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  - The portion of the blood sample made of red blood cells.
- Oxygen saturation test: A procedure to check for the amount of oxygen being carried by the red blood cells. A lower than normal amount of oxygen may be a sign of lung disease or other health problems. One method uses a device clipped to the finger. The device senses the amount of oxygen in the blood flowing through the small blood vessels in the finger. Another method uses a sample of blood taken from an artery, usually in the wrist, that is tested for the amount of oxygen.
- Maximum inspiratory pressure (MIP) test: The MIP is the highest pressure that can be reached in the lungs when you take a deep breath. When you breathe through a device called a manometer, the device measures the pressure. The information is sent to a computer. The pressure level shows how strong the breathing muscles are.

### There are different ways to treat the causes of dyspnea in cancer patients.

Treatment may include the following:

- Radiation therapy: Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the cancer.
- Chemotherapy: Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy). The way the chemotherapy is given depends on the type and stage of the cancer being treated.
- Laser therapy for tumors inside large airways: Use of a laser beam (a narrow beam of intense light) as a knife to remove the tumor.
- Cauterization of tumors inside large airways: Use of a hot instrument, an electric current, or a caustic substance to destroy the tumor.
- Procedures to remove fluid that has built up around the lungs (malignant pleural effusion), around the heart (malignant pericardial effusion ), or in the abdominal cavity (ascites). (See the sections on controlling the signs and symptoms of malignant pleural effusion and malignant pericardial effusion for more information.)
- Stent placement: Surgery to place a stent (thin tube) in an airway to keep it open. This may be done if a large airway is blocked by a tumor that is pressing on it from the outside.
- Medicine:
  - Steroid drugs for inflamed or swollen lymph vessels in the lungs.
  - Antibiotics for chest infections. These may be used along with breathing treatments.
  - Anticoagulants for blood clots that are blocking blood vessels in the lungs.
  - Bronchodilators that are inhaled to open up the bronchioles (small airways) in the lungs.
  - Diuretics and other drugs for heart failure.
- Blood transfusions for anemia.

### Treatment of dyspnea will depend on what is causing it.

The treatment of dyspnea depends on its cause, as follows:

Table 1

If the dyspnea is caused by: | Then the treatment may be:
Tumor blocking the large or small airways in the chest or lung | • Radiation therapy.
Tumor blocking the large or small airways in the chest or lung | • Chemotherapy, for tumors that usually respond quickly to this treatment.
Tumor blocking the large or small airways in the chest or lung | • Laser surgery to remove the tumor.
Tumor blocking the large or small airways in the chest or lung | • Cauterization of tumors.
Tumor blocking the large or small airways in the chest or lung | • Stent placement to keep airway open.
Pleural effusion | • Removal of the extra fluid around the lung using a needle or chest drain.
Pericardial effusion | • Removal of the extra fluid around the heart using a needle.
Pericardial effusion | • Intrapericardial chemotherapy.
Pericardial effusion | • Surgery.
Ascites | • Removal of the extra fluid in the abdominal cavity using a needle.
Carcinomatous lymphangitis | • Steroid therapy.
Carcinomatous lymphangitis | • Chemotherapy, for tumors that usually respond quickly to this treatment.
Superior vena cava syndrome | • Chemotherapy, for tumors that usually respond quickly to this treatment.
Superior vena cava syndrome | • Radiation therapy.
Superior vena cava syndrome | • Surgery to place a stent in the superior vena cava to keep it open.
Superior vena cava syndrome | • Opioids and/or steroid therapy.
Chest infections | • Antibiotics.
Chest infections | • Breathing treatments.
Pulmonary embolism | • Anticoagulants.
Bronchospasms or chronic obstructive pulmonary disease | • Bronchodilators.
Bronchospasms or chronic obstructive pulmonary disease | • Inhaled steroids.
Postradiation bronchiolitis obliterans | • Steroid therapy.
Heart failure | • Diuretics and other heart medicines.
Anemia | • Blood transfusion
Checkpoint inhibitor immunotherapy–related pneumonitis | • Withholding drug therapy.
Checkpoint inhibitor immunotherapy–related pneumonitis | • Corticosteroids.
Checkpoint inhibitor immunotherapy–related pneumonitis | • Close follow-up.

### Treatment may be to control the signs and symptoms of dyspnea.

Treatment to control the signs and symptoms of dyspnea may include the following:

- Oxygen therapy: If you cannot breathe in enough oxygen, you may be given extra oxygen to inhale from a tank. Devices that deliver a high flow of oxygen or air mixed with oxygen may also be prescribed.
- Medicines: Opioids, such as morphine, may help with distress, fatigue, and the feeling that you cannot get enough air. Other drugs may be used to treat dyspnea that is related to panic disorder or severe anxiety.
- Non-drug treatments:
  - Breathing methods, such as breathing with the lips pursed (almost closed).
  - Using a fan to blow cold air across the cheek.
  - Meditation.
  - Relaxation training.
  - Biofeedback.
  - Talk therapy to relieve anxiety.

## Chronic Coughing

Key Points for This Section
- Chronic coughing may cause much physical distress.
- It may be possible to treat the cause of chronic coughing.
- Medicines may be used to control chronic coughing.

### Chronic coughing may cause much physical distress.

Chronic cough may cause pain, trouble sleeping, dyspnea, or fatigue. The causes of chronic coughing are almost the same as the causes of dyspnea. See Dyspnea section for list of causes.

### It may be possible to treat the cause of chronic coughing.

Treatments may include:

- Radiation therapy for a tumor that is blocking the airway.
- Placement of a stent (tube) to close a fistula caused by esophageal cancer.
- Draining the fluid of a pleural effusion.
- Corticosteroids for lymphangitic carcinomatosis.

### Medicines may be used to control chronic coughing.

Medicines may include:

- Medicines to stop the cough, including opioids.
- Medicine that breaks down mucus.
- An inhaled drug for chronic coughing related to lung cancer.

## Malignant Pleural Effusion

Key Points for This Section
- Pleural effusion is extra fluid around the lungs.
- Pleural effusion may be caused by cancer, cancer treatment, or other conditions.
- Signs and symptoms of pleural effusion include dyspnea (shortness of breath) and cough.
- Finding out the cause of pleural effusion will help plan the treatment.
- Treatment may be to control signs and symptoms of pleural effusion and improve quality of life.

### Pleural effusion is extra fluid around the lungs.

The pleural cavity is the space between the pleura (thin layer of tissue) that covers the outer surface of each lung and lines the inner wall of the chest cavity. Pleural tissue usually makes a small amount of fluid that helps the lungs move smoothly in the chest while a person is breathing. A pleural effusion is extra fluid in the pleural cavity. The fluid presses on the lungs and makes it hard to breathe.

### Pleural effusion may be caused by cancer, cancer treatment, or other conditions.

A pleural effusion may be malignant (caused by cancer) or nonmalignant (caused by a condition that is not cancer). Malignant pleural effusion is a common problem for patients who have certain cancers. Lung cancer, breast cancer, lymphoma, and leukemia cause most malignant effusions.

Pleural effusion also may be caused by radiation therapy, chemotherapy, a collapsed lung, or cancer that has spread to lymph nodes. Some cancer patients have conditions such as congestive heart failure, pneumonia, blood clot in the lung, or poor nutrition that may lead to a pleural effusion.

### Signs and symptoms of pleural effusion include dyspnea (shortness of breath) and cough.

These and other signs and symptoms may be caused by a pleural effusion. Talk to your doctor if you have any of the following problems:

- Dyspnea (shortness of breath).
- Cough.
- An uncomfortable feeling or pain in the chest.

### Finding out the cause of pleural effusion will help plan the treatment.

Treatment for a malignant pleural effusion is different from treatment for a nonmalignant effusion, so the right diagnosis is important. Diagnostic tests used to find the cause of the pleural effusion include the following:

- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
  A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
  Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
- CT scan: A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
- Thoracentesis: The removal of fluid from the space between the lining of the chest and the lung, using a needle. A pathologist views the fluid under a microscope to look for cancer cells. This procedure may be used to reduce pressure on the lungs.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. If thoracentesis is not possible, a biopsy may be done during a thoracoscopy. A thoracoscopy is a procedure to look at the organs inside the chest to check for abnormal areas. An incision (cut) is made between two ribs and a thoracoscope (a thin, lighted tube with a lens for viewing) is inserted into the chest. A cutting tool at the end of the thoracoscope is used to remove a sample of tissue.
- Flow cytometry: A laboratory test that measures the number of cells in a sample, the percentage of live cells in a sample, and certain characteristics of the cells, such as size, shape, and the presence of tumor (or other) markers on the cell surface. The cells from a sample of a patient’s blood, bone marrow, or other tissue are stained with a fluorescent dye, placed in a fluid, and then passed one at a time through a beam of light. The test results are based on how the cells that were stained with the fluorescent dye react to the beam of light.

The type of cancer, previous treatment for cancer, and your choices also are important in planning treatment.

### Treatment may be to control signs and symptoms of pleural effusion and improve quality of life.

A malignant pleural effusion often occurs in cancer that is advanced, cannot be removed by surgery, or continues to grow or spread during treatment. It is also common during the last few weeks of life. The goal of treatment is usually palliative, to relieve signs and symptoms and improve quality of life.

Treatment of the signs and symptoms of malignant pleural effusion includes the following:

- Thoracentesis. Thoracentesis is a procedure to remove extra fluid from the pleural cavity between the lung and the chest wall using a needle. Removal of the fluid may help to relieve severe symptoms for a short time. A few days after the extra fluid is removed, it is likely it will begin to come back. The risk of a thoracentesis includes bleeding, infection, collapsed lung, fluid in the lungs, and a sudden drop in blood pressure.
- Indwelling pleural catheter (IPC). An indwelling pleural catheter (IPC) is a small tube that is inserted and left in place to keep fluid from building up around the lungs. One end of the tube stays inside the chest and the other passes outside the body to allow fluid to drain. This type of catheter may be used for long-term care so that a separate procedure won't need to be done each time draining is needed. Risks of IPCs include infection and blockage of the catheter.
- Pleurodesis. This is a procedure to close the pleural space so that fluid cannot collect there. Fluid is first removed by thoracentesis, using a chest tube. A drug that causes the pleural space to close is then inserted into the space through a chest tube. Drugs such as bleomycin or talc may be used.
- Surgery. Surgery may be done to put in a shunt (tube) to carry the fluid from the pleural cavity to the abdominal cavity, where the fluid is easier to remove. Pleurectomy is another type of surgery that may be used. In this procedure, the part of the pleura that lines the chest cavity is removed.

## Malignant Pericardial Effusion

Key Points for This Section
- Pericardial effusion is extra fluid around the heart.
- Pericardial effusion may be caused by cancer or other conditions.
- Signs and symptoms of pericardial effusion include dyspnea (shortness of breath) and cough.
- Pericardial effusion usually occurs in advanced cancer.
- Treatment may be to control the symptoms of pericardial effusion and improve quality of life.

### Pericardial effusion is extra fluid around the heart.

Pericardial effusion is extra fluid inside the sac that surrounds the heart. The extra fluid causes pressure on the heart, which stops it from pumping blood normally. If fluid builds up, a condition called cardiac tamponade may occur. In cardiac tamponade, the heart cannot pump enough blood to the rest of the body. This is life-threatening and must be treated right away.

### Pericardial effusion may be caused by cancer or other conditions.

A pericardial effusion may be malignant (caused by cancer) or nonmalignant (caused by a condition that is not cancer). Malignant pericardial effusion is common in lung cancer, breast cancer, melanoma, lymphoma, and leukemia patients. Pericarditis (swelling of tissues around the heart), a heart attack, hypothyroidism, or systemic lupus erythematosus are examples of nonmalignant causes of pericardial effusion. Radiation therapy or chemotherapy may cause pericarditis, leading to pericardial effusion.

### Signs and symptoms of pericardial effusion include dyspnea (shortness of breath) and cough.

At first, a pericardial effusion may not cause any signs or symptoms. These and other signs and symptoms may be caused by a pericardial effusion or cardiac tamponade. Check with your doctor if you have any of the following:

- Dyspnea (shortness of breath).
- Cough.
- Chest pain or pressure.
- Trouble breathing while lying flat.
- Fast heart beat or breathing.
- Feeling faint.
- Pressure in the upper abdomen.
- Tiredness.
- Weakness.

### Pericardial effusion usually occurs in advanced cancer.

Pericardial effusion usually occurs in advanced cancer or in the last few weeks of life. During these times, it may be more important to relieve the symptoms than to diagnose the condition. However, in some cases, the following tests and procedures may be used to diagnose pericardial effusion:

- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
  A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
  Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
- Echocardiography: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs of the chest. The echoes form a picture of the heart's position, motion of the walls, and internal parts such as the valves.
- Electrocardiogram (EKG or ECG): A line graph recording of the heart's electrical activity to check its rate and rhythm. A number of electrodes (small pads) are placed on the patient’s chest, arms, and legs. The electrodes are connected by wires to the EKG machine. Heart activity is then recorded on paper. Electrical activity that is faster or slower than normal may be a sign of heart problems.
- Pericardiocentesis: A procedure to remove fluid from the pericardium using a needle inserted through the chest wall. The doctor may use echocardiography to watch the movement of the heart and needle inside the chest. The fluid is viewed under a microscope by a pathologist to check for cancer cells or signs of infection. This procedure can also be used to treat pericardial effusion. Removing the fluid lessens the pressure on the heart.
- Flow cytometry: A laboratory test that measures the number of cells in a sample, the percentage of live cells in a sample, and certain characteristics of the cells, such as size, shape, and the presence of tumor (or other) markers on the cell surface. The cells from a sample of a patient’s blood, bone marrow, or other tissue are stained with a fluorescent dye, placed in a fluid, and then passed one at a time through a beam of light. The test results are based on how the cells that were stained with the fluorescent dye react to the beam of light.

### Treatment may be to control the symptoms of pericardial effusion and improve quality of life.

The goal of treatment is usually palliative, to relieve symptoms and improve quality of life. If a malignant pericardial effusion is severe, it is usually controlled by draining the fluid.

Treatment options include the following:

- Pericardiocentesis. A procedure to remove the extra fluid from the sac around the heart using a needle inserted through the chest wall. The doctor may use echocardiography to watch the movement of the heart and needle inside the chest. Removing the fluid can reduce pressure on the heart. In some patients, fluid may again collect in the sac around the heart after pericardiocentesis. A catheter (flexible tube used to put fluids into or take blood out of a vein) may be inserted and left in place for several days until there is little to no fluid drainage. For patients with advanced cancer, this procedure may be used instead of more serious surgery.
- Pericardial sclerosis. A procedure to close the pericardial space so fluid cannot collect in the sac around the heart. Fluid is first removed by pericardiocentesis. A drug or chemical is then injected through a catheter (flexible tube used to put fluids into or take blood out of a vein) into the pericardial space to cause it to close. Three or more treatments may be needed to completely close the pericardial space.
- Pericardiotomy. A procedure to insert a drainage tube. An incision (cut) is made in the chest and then in the pericardium and a drainage tube is put in place. This increases the amount of fluid that can be drained from the pericardium.
- Pericardiectomy. Surgery to remove part of the pericardium. This may be done to drain fluid quickly when cardiac tamponade occurs. This surgery is also called pericardial window.
- Balloon pericardiostomy. A catheter (flexible tube used to put fluids into or take blood out of a vein) with a balloon tip is inserted through the chest and into the pericardium. The balloon is then inflated to make the pericardial opening bigger. The balloon is then deflated and removed. The bigger opening allows the fluid to drain into the pleural cavity. This may be used when an effusion has recurred (come back) after pericardiocentesis or instead of more serious surgery.
- Video-assisted thoracoscopic surgery. Surgery that uses a video camera in the chest area that shows an enlarged image on a television screen. This may be preferred since it uses a small incision instead of a larger one.

## Superior Vena Cava Syndrome

Key Points for This Section
- Superior vena cava syndrome (SVCS) is a group of signs and symptoms that occur when the superior vena cava is partly blocked.
- SVCS is usually caused by cancer.
- Common signs and symptoms of SVCS include breathing problems and coughing.
- Tests are done to find and diagnose the blockage.
- Treatment for SVCS caused by cancer depends on the cause, signs and symptoms, and prognosis.
- Treatments for SVCS include watchful waiting, chemotherapy, radiation therapy, thrombolysis, stent placement, and surgery.
- Palliative care may be given to relieve signs and symptoms of SVCS.

### Superior vena cava syndrome (SVCS) is a group of signs and symptoms that occur when the superior vena cava is partly blocked.

The superior vena cava is a major vein that leads to the heart. The heart is divided into four parts. The right and left atrium make up the top parts of the heart and the right and left ventricle make up the bottom parts of the heart. The right atrium of the heart receives blood from two major veins:

- The superior vena cava returns blood from the upper body to the heart.
- The inferior vena cava returns blood from the lower body to the heart.

Different conditions can slow the flow of blood through the superior vena cava. These include a tumor in the chest, nearby lymph nodes that are swollen (from cancer), or a blood clot in the superior vena cava. The vein may become completely blocked. Sometimes, smaller veins in the area become larger and take over for the superior vena cava if it is blocked, but this takes time. Superior vena cava syndrome (SVCS) is the group of signs and symptoms that occur when this vein is partly blocked.

### SVCS is usually caused by cancer.

SVCS is usually caused by cancer. In adults, SVCS is most common in the following types of cancer:

- Lung cancer.
- Non-Hodgkin lymphoma (NHL).

Less common causes of SVCS include:

- A blood clot that forms during the use of an intravenous catheter (flexible tube used to put fluids into or take blood out of a vein) in the superior vena cava. A clot may also be caused by pacemaker wires.
- Infection or cancer in the chest that causes affected tissues to become thick and hard.
- Other cancers, including metastatic breast cancer, metastatic germ cell tumors, colon cancer, esophageal cancer, Kaposi sarcoma, and Hodgkin lymphoma.
- Thymoma.
- Abnormal mass in the thyroid gland.
- Behcet syndrome (a disease of the immune system).
- Sarcoidosis (a disease of the lymph nodes that acts like tuberculosis).

### Common signs and symptoms of SVCS include breathing problems and coughing.

The signs and symptoms of SVCS are more severe if the vein becomes blocked quickly. This is because the other veins in the area do not have time to widen and take over the blood flow that cannot pass through the superior vena cava.

The most common signs are:

- Trouble breathing.
- Coughing.
- Swelling in the face, neck, upper body, or arms.

Less common signs and symptoms include the following:

- Hoarse voice.
- Trouble swallowing or talking.
- Coughing up blood.
- Swollen veins in the chest or neck.
- Chest pain.
- Rapid breathing.

### Tests are done to find and diagnose the blockage.

The following tests may be done to diagnose SVCS and find the blockage:

- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body. The radiologist will look for any masses, a pleural effusion, a collapsed lung, or an enlarged heart.
  A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
  Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the chest, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Venography: A procedure to x-ray veins. A contrast dye is injected into the veins to outline them on the x-rays.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Ultrasound: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.

It is important to find out the cause of SVCS before starting treatment. The type of cancer can affect the type of treatment needed. Unless the airway is blocked or the brain is swelling, waiting to start treatment while a diagnosis is made usually causes no problem in adults. If doctors think lung cancer is causing the problem, a sputum sample may be taken and a biopsy may be done.

### Treatment for SVCS caused by cancer depends on the cause, signs and symptoms, and prognosis.

Treatment for SCVS caused by cancer depends on the following:

- The type of cancer.
- The cause of the blockage.
- The severity of the signs and symptoms.
- The prognosis (chance of recovery).
- Whether treatment is meant to cure, control, or relieve the signs and symptoms of cancer.
- The patient's wishes.

### Treatments for SVCS include watchful waiting, chemotherapy, radiation therapy, thrombolysis, stent placement, and surgery.

- Watchful waiting. Watchful waiting is closely monitoring a patient’s condition without giving any treatment unless signs or symptoms appear or change. A patient who has good blood flow through smaller veins in the area and mild symptoms may not need treatment.
  The following may be used to relieve signs or symptoms and keep the patient comfortable:
  - Keeping the upper body raised higher than the lower body.
  - Corticosteroids (drugs that reduce swelling).
  - Diuretics (drugs that make excess fluid pass from the body in urine). Patients taking diuretics are closely watched because these drugs can cause dehydration (loss of too much fluid from the body).
- Chemotherapy. Chemotherapy is the usual treatment for tumors that respond to anticancer drugs, including small cell lung cancer and lymphoma. Chemotherapy stops the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy). The way the chemotherapy is given depends on the type and stage of the cancer being treated.
- Radiation therapy. If the blockage of the superior vena cava is caused by a tumor that does not usually respond to chemotherapy, radiation therapy may be given. Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the cancer. The way the radiation therapy is given depends on the type and stage of the cancer being treated.
- Thrombolysis. SVCS may occur when a thrombus (blood clot) forms in a partly blocked vein. Thrombolysis is a way to break up and remove blood clots. This may done by a thrombectomy. Thrombectomy is surgery to remove the blood clot or the use of a device inserted into the vein to remove the blood clot. This may be done with or without the use of drugs to break up the clot.
- Stent placement. If the superior vena cava is partly blocked by the tumor, an expandable stent (tube) may be placed inside the superior vena cava to help keep it open and allow blood to pass through. This helps most patients. Drugs to keep more blood clots from forming may also be used.
- Surgery. Surgery to bypass (go around) the blocked part of the vein is sometimes used for cancer patients, but is used more often for patients who do not have cancer.

### Palliative care may be given to relieve signs and symptoms of SVCS.

The signs and symptoms of superior vena cava syndrome can be upsetting. It is important that you and your family ask questions about superior vena cava syndrome and how to treat it. This can help relieve anxiety about signs and symptoms such as swelling, trouble swallowing, coughing, and hoarseness.

If you have advanced cancer you may decide not to have any more treatment. Palliative care can help keep you comfortable by relieving signs and symptoms to improve your quality of life.

## Superior Vena Cava Syndrome in Children

Key Points for This Section
- Superior vena cava syndrome (SVCS) in a child is a serious medical emergency because the child's windpipe can become blocked.
- The most common symptoms of SVCS in children are a lot like those in adults.
- The most common cause of SVCS in children is non-Hodgkin lymphoma.
- SVCS in children may be diagnosed and treated before a diagnosis of cancer is made.
- Treatment for SVCS in children may include radiation therapy, drugs, or surgery.

### Superior vena cava syndrome (SVCS) in a child is a serious medical emergency because the child's windpipe can become blocked.

Superior vena cava syndrome (SVCS) is rare in children, but when it occurs, it can be life-threatening. In adults, the windpipe is stiff, but in children, it is softer and can more easily be squeezed shut or blocked. A child's windpipe is narrow, so any amount of swelling can cause breathing problems. Squeezing of the trachea is called superior mediastinal syndrome (SMS). Because SVCS and SMS usually happen together in children, the two syndromes are considered to be the same.

### The most common symptoms of SVCS in children are a lot like those in adults.

Common signs and symptoms include the following:

- Coughing.
- Hoarseness.
- Trouble breathing.
- Chest pain.

There are other less common but more serious signs and symptoms:

- Fainting.
- Anxiety.
- Confusion.
- Drowsiness.
- Headache.
- Vision problems.
- A feeling of fullness in the ears.

### The most common cause of SVCS in children is non-Hodgkin lymphoma.

SVCS in children is rare. The most common cause is non-Hodgkin lymphoma. As in adults, SVCS may also be caused by a blood clot that forms during use of an intravenous catheter (flexible tube used to put fluids into or take blood out of a vein) in the superior vena cava.

### SVCS in children may be diagnosed and treated before a diagnosis of cancer is made.

A physical exam, chest x-ray, and medical history are usually all that are needed to diagnose superior vena cava syndrome in children. Even if doctors think cancer is causing SVCS, a biopsy may not be done. This is because the lungs and heart of a child with SVCS may not be able to handle the anesthesia needed. Other imaging tests may be done to help find out if anesthesia can be safely used. In most cases, treatment for SVCS will begin before a diagnosis of cancer is made.

### Treatment for SVCS in children may include radiation therapy, drugs, or surgery.

There are several ways to treat SVCS in children.

- Radiation therapy. Radiation therapy is usually used to treat a tumor that is blocking the vein. After radiation therapy, there may be more trouble breathing because swelling narrows the windpipe. A drug to reduce swelling or tumor size may be given.
- Drugs. Chemotherapy, steroids, or other drugs may be used.
- Surgery. Surgery may be needed to bypass (go around) the blocked part of the vein or to place a stent (thin tube) to open the vein.

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the pathophysiology and treatment of cardiopulmonary syndromes, including dyspnea, malignant pleural effusion, malignant pericardial effusion, and superior vena cava syndrome. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cardiopulmonary Syndromes. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/cardiopulmonary-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389457]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).